# Langerhans Cell Histiocytosis Treatment (PDQ®)

Patient Version

This PDQ cancer information summary has current information about the treatment of childhood and adult Langerhans cell histiocytosis. It is meant to inform and help patients, families, and caregivers. It does not give formal guidelines or recommendations for making decisions about health care.

Editorial Boards write the PDQ cancer information summaries and keep them up to date. These Boards are made up of experts in cancer treatment and other specialties related to cancer. The summaries are reviewed regularly and changes are made when there is new information. The date on each summary ("Date Last Modified") is the date of the most recent change. The information in this patient summary was taken from the health professional version, which is reviewed regularly and updated as needed, by the PDQ Pediatric Treatment Editorial Board.

## General Information About Langerhans Cell Histiocytosis (LCH)

Key Points for This Section
- Langerhans cell histiocytosis is a rare disorder that can damage tissue or cause lesions to form in one or more places in the body.
- Family history of cancer or having a parent who was exposed to certain chemicals may increase the risk of LCH.
- The signs and symptoms of LCH depend on where it is in the body.
  - Bone
  - Skin and nails
  - Mouth
  - Lymph nodes and thymus
  - Endocrine system
  - Eye
  - Central nervous system (CNS)
  - Liver and spleen
  - Lung
  - Bone marrow
- Tests that examine the organs and body systems where LCH may occur are used to diagnose LCH.
- Certain factors affect prognosis (chance of recovery) and treatment options.

### Langerhans cell histiocytosis is a rare disorder that can damage tissue or cause lesions to form in one or more places in the body.

Langerhans cell histiocytosis (LCH) is a rare disease that begins in LCH cells. LCH cells are a type of dendritic cell that normally helps the body fight infection. Sometimes mutations (changes) develop in genes that control how dendritic cells function. These include mutations of the BRAF, MAP2K1, RAS, and ARAF genes. These mutations may cause too many LCH cells to grow and build up in certain parts of the body, where they can damage tissue or form lesions.

#### It is not known whether LCH is a form of cancer or a cancer-like disease.

Doctors who treat cancer also treat LCH, and sometimes they use cancer therapies to treat this disease. For more information, see the sections on the treatment of LCH in children and the treatment of LCH in adults.

### Family history of cancer or having a parent who was exposed to certain chemicals may increase the risk of LCH.

Anything that increases a person's risk of getting a disease is called a risk factor. Not every child with one or more of these risk factors will develop LCH, and it will develop in some children who don’t have any known risk factors. Talk with your doctor if you think you may be at risk.

Risk factors for LCH may include the following:

- Having a parent who was exposed to certain solvents.
- Having a parent who was exposed to metal, granite, or wood dust in the workplace.
- Having a family history of cancer or LCH.
- Having a personal history or family history of thyroid disease.
- Having infections as a newborn.
- Smoking, especially in young adults.
- Being Hispanic.
- Not being vaccinated as a child.

### The signs and symptoms of LCH depend on where it is in the body.

These and other signs and symptoms may be caused by LCH or by other conditions. Check with your doctor if you or your child have any of the following:

#### Bone

Signs or symptoms of LCH that affects the bone may include:

- Swelling or a lump over a bone, such as the skull, jawbone, ribs, pelvis, spine, thigh bone, upper arm bone, elbow, eye socket, or bones around the ear.
- Pain where there is swelling or a lump over a bone.

Children with LCH lesions in bones around the ears or eyes have a high risk of diabetes insipidus and other central nervous system diseases.

#### Skin and nails

LCH in infants may affect the skin only. In some cases, skin-only LCH may get worse over weeks or months and become a form called high-risk multisystem LCH.

In infants, signs or symptoms of LCH that affects the skin may include:

- Flaking of the scalp that may look like “cradle cap.”
- Flaking in the creases of the body, such as the inner elbow or perineum.
- Raised skin rash with brown or purple areas that occur anywhere on the body.

In children and adults, signs or symptoms of LCH that affects the skin and nails may include:

- Flaking of the scalp that may look like dandruff.
- Raised skin rash with red, brown, or crusted areas that may be itchy or painful. The rash can occur in the groin area or on the abdomen, back, or chest.
- Bumps or ulcers on the scalp.
- Ulcers behind the ears, under the breasts, or in the groin area.
- Fingernails that fall off or have discolored grooves that run across the nail.

#### Mouth

Signs or symptoms of LCH that affects the mouth may include:

- Swollen gums.
- Sores on the roof of the mouth, inside the cheeks, or on the tongue or lips.
- Teeth that become uneven or fall out.

#### Lymph nodes and thymus

Signs or symptoms of LCH that affects the lymph nodes or thymus may include:

- Swollen lymph nodes.
- Cough, trouble breathing, or fast breathing.
- Superior vena cava syndrome. This can cause coughing, trouble breathing, and swelling of the face, neck, and upper arms. For more information, see Cardiopulmonary Syndromes.

#### Endocrine system

Signs or symptoms of LCH that affects the pituitary gland may include:

- Diabetes insipidus. This can cause a strong thirst and frequent urination.
- Slow growth.
- Early or late puberty.
- Being very overweight.

Signs or symptoms of LCH that affects the thyroid may include:

- Swollen thyroid gland.
- Hypothyroidism. This can cause tiredness, lack of energy, being sensitive to cold, constipation, dry skin, thinning hair, memory problems, trouble concentrating, and depression. In infants, this can also cause a loss of appetite and choking on food. In children and adolescents, this can cause behavior problems, weight gain, slow growth, and late puberty.
- Trouble breathing.

#### Eye

Signs or symptoms of LCH that affects the eye may include:

- Vision problems or blindness.

#### Central nervous system (CNS)

Signs or symptoms of LCH that affects the CNS (brain and spinal cord) may include:

- Loss of balance, uncoordinated body movements, and trouble walking.
- Trouble speaking.
- Trouble seeing.
- Headaches.
- Changes in behavior or personality.
- Memory problems.

These signs and symptoms may be caused by lesions in the CNS or by CNS neurodegenerative syndrome.

#### Liver and spleen

Signs or symptoms of LCH that affects the liver or spleen may include:

- Swelling in the abdomen caused by a buildup of extra fluid.
- Trouble breathing.
- Yellowing of the skin and whites of the eyes.
- Itching.
- Easy bruising or bleeding.
- Feeling very tired.
- Diarrhea.
- Bloody stools.

#### Lung

Signs or symptoms of LCH that affects the lung may include:

- Collapsed lung. This condition can cause chest pain or tightness, trouble breathing, feeling tired, and a bluish color to the skin.
- Trouble breathing, especially in adults who smoke.
- Dry cough.
- Chest pain.

#### Bone marrow

Signs or symptoms of LCH that affects the bone marrow may include:

- Easy bruising or bleeding.
- Fever.
- Frequent infections.

### Tests that examine the organs and body systems where LCH may occur are used to diagnose LCH.

In addition to asking about your health history and doing a physical exam, your doctor may perform the following tests and procedures to diagnose LCH or conditions caused by LCH:

- Complete blood count (CBC) with differential: A procedure in which a sample of blood is drawn and checked for the following:
  - The amount of hemoglobin (the protein that carries oxygen) in the red blood cells.
  - The portion of the blood sample made up of red blood cells.
  - The number and type of white blood cells.
  - The number of red blood cells and platelets.
- Blood chemistry studies: A procedure in which a blood sample is checked to measure the amounts of certain substances released into the body by organs and tissues in the body. An unusual (higher or lower than normal) amount of a substance can be a sign of disease.
- Liver function test: A blood test to measure the blood levels of certain substances released by the liver. A high or low level of these substances can be a sign of disease in the liver.
- BRAF gene testing: A laboratory test in which a sample of blood or tissue is tested for certain mutations in the BRAF gene.
- Urinalysis: A test to check the color of urine and its contents, such as sugar, protein, red blood cells, and white blood cells.
- Water deprivation test: A test to check how much urine is made and whether it becomes concentrated when little or no water is given. This test is used to diagnose diabetes insipidus, which may be caused by LCH.
- Bone marrow aspiration and biopsy: The removal of bone marrow and a small piece of bone by inserting a hollow needle into the hipbone. A pathologist views the bone marrow and bone under a microscope to look for signs of LCH.
  Bone marrow aspiration and biopsy. After a small area of skin is numbed, a long, hollow needle is inserted through the patient's skin and hip bone into the bone marrow. A sample of bone marrow and a small piece of bone are removed for examination under a microscope.
  Bone marrow aspiration and biopsy; drawing shows a patient lying face down on a table and a bone marrow needle being inserted into the hip bone. An inset shows a close up of the needle being inserted through the skin and hip bone into the bone marrow.
  The following test may be done on the tissue that was removed:
  - Immunohistochemistry: A laboratory test that uses antibodies to check for certain antigens (markers) in a sample of a patient’s tissue. The antibodies are usually linked to an enzyme or a fluorescent dye. After the antibodies bind to a specific antigen in the tissue sample, the enzyme or dye is activated, and the antigen can then be seen under a microscope. This type of test is used to help diagnose cancer and to help tell one type of cancer from another type of cancer.
- Bone scan: A procedure to check if there are rapidly dividing cells in the bone. A very small amount of radioactive material is injected into a vein and travels through the bloodstream. The radioactive material collects in the bones with LCH and is detected by a scanner.
  Bone scan. A small amount of radioactive material is injected into the child's vein and travels through the blood. The radioactive material collects in the bones. As the child lies on a table that slides under the scanner, the radioactive material is detected and images are made on a computer screen.
  Bone scan; drawing shows a child lying on a table that slides under the scanner, a technician operating the scanner, and a computer monitor that will show images made during the scan.
- X-ray: An x-ray of the organs and bones inside the body. An x-ray is a type of energy beam that can go through the body and onto film, making a picture of areas inside the body. Sometimes a skeletal survey is done. This is a procedure to x-ray all the bones in the body.
- CT scan (CAT scan): A procedure that makes a series of detailed pictures of areas inside the body, taken from different angles. The pictures are made by a computer linked to an x-ray machine. A dye may be injected into a vein or swallowed to help the organs or tissues show up more clearly. This procedure is also called computed tomography, computerized tomography, or computerized axial tomography.
  Computed tomography (CT) scan of the abdomen. The patient lies on a table that slides through the CT machine, which takes x-ray pictures of the inside of the body.
  Computed tomography (CT) scan of the abdomen; drawing shows the patient on a table that slides through the CT machine, which takes x-ray pictures of the inside of the body.
- MRI (magnetic resonance imaging): A procedure that uses a magnet, radio waves, and a computer to make a series of detailed pictures of areas inside the body. A substance called gadolinium may be injected into a vein. The gadolinium collects around the LCH cells so that they show up brighter in the picture. This procedure is also called nuclear magnetic resonance imaging (NMRI).
  Magnetic resonance imaging (MRI) scan. The child lies on a table that slides into the MRI machine, which takes a series of detailed pictures of areas inside the body. The positioning of the child on the table depends on the part of the body being imaged.
  Magnetic resonance imaging (MRI) scan; drawing shows a child lying on a table that slides into the MRI machine, which takes a series of detailed pictures of areas inside the body.
- PET scan (positron emission tomography scan): A procedure to find tumor cells in the body. A small amount of radioactive glucose (sugar) is injected into a vein. The PET scanner rotates around the body and makes a picture of where glucose is being used in the body. Tumor cells show up brighter in the picture because they are more active and take up more glucose than normal cells do.
  Positron emission tomography (PET) scan. The child lies on a table that slides through the PET scanner. The head rest and white strap help the child lie still. A small amount of radioactive glucose (sugar) is injected into the child's vein, and a scanner makes a picture of where the glucose is being used in the body. Cancer cells show up brighter in the picture because they take up more glucose than normal cells do.
  Positron emission tomography (PET) scan; drawing shows a child lying on table that slides through the PET scanner.
- Ultrasound exam: A procedure in which high-energy sound waves (ultrasound) are bounced off internal tissues or organs and make echoes. The echoes form a picture of body tissues called a sonogram. The picture can be printed to be looked at later.
  Abdominal ultrasound. An ultrasound transducer connected to a computer is passed over the surface of the abdomen. The ultrasound transducer bounces sound waves off internal organs and tissues to make echoes that form a sonogram (computer picture).
  Abdominal ultrasound; drawing shows a woman on an exam table during an abdominal ultrasound procedure. A diagnostic sonographer (a person trained to perform ultrasound procedures) is shown passing a transducer (a device that makes sound waves that bounce off tissues inside the body) over the surface of the patient’s abdomen. A computer screen shows a sonogram (computer picture).
- Pulmonary function test (PFT): A test to see how well the lungs are working. It measures how much air the lungs can hold and how quickly air moves into and out of the lungs. It also measures how much oxygen is used and how much carbon dioxide is given off during breathing. This is also called lung function test.
- Bronchoscopy: A procedure to look inside the trachea and large airways in the lung for abnormal areas. A bronchoscope is inserted through the nose or mouth into the trachea and lungs. A bronchoscope is a thin, tube-like instrument with a light and a lens for viewing. It may also have a tool to remove tissue samples, which are checked under a microscope for signs of LCH.
- Endoscopy: A procedure to look at organs and tissues inside the body to check for abnormal areas in the gastrointestinal tract or lungs. An endoscope is inserted through an incision (cut) in the skin or opening in the body, such as the mouth. An endoscope is a thin, tube-like instrument with a light and a lens for viewing. It may also have a tool to remove tissue or lymph node samples, which are checked under a microscope for signs of disease.
- Biopsy: The removal of cells or tissues so they can be viewed under a microscope by a pathologist to check for LCH cells. To diagnose LCH, a biopsy of bone, skin, lymph nodes, liver, or other sites of disease may be done.

### Certain factors affect prognosis (chance of recovery) and treatment options.

LCH in organs such as the skin, bones, lymph nodes, or pituitary gland usually gets better with treatment and is called "low-risk." LCH in the spleen, liver, or bone marrow is harder to treat and is called "high-risk." Children with LCH in high-risk organs and the gastrointestinal tract have a greater risk of not responding to treatment than patients with high-risk LCH and no disease in the gastrointestinal tract. High-risk LCH is usually seen in children younger than 2 years.

The prognosis and treatment options depend on the following:

- Which organs or body systems are affected by LCH.
- How many organs or body systems the LCH affects.
- Whether LCH is found in the liver, spleen, bone marrow, or certain bones in the skull.
- How quickly LCH responds to initial treatment.
- Whether there are certain mutations in the BRAF gene.
- Whether LCH has just been diagnosed or has come back (recurred).

In infants up to 1 year of age, LCH may go away without treatment.

## Stages of LCH

Key Points for This Section
- There is no standard staging system for Langerhans cell histiocytosis (LCH).
- Treatment of LCH is based on where LCH cells are found in the body and whether the LCH is low risk or high risk.
- Sometimes LCH continues to grow or comes back after treatment.

### There is no standard staging system for Langerhans cell histiocytosis (LCH).

The process used to find out if cancer has spread to other parts of the body is called staging. There is no standard staging system for LCH.

### Treatment of LCH is based on where LCH cells are found in the body and whether the LCH is low risk or high risk.

LCH is described as single-system disease or multisystem disease, depending on how many body systems are affected:

- Single-system LCH: LCH is found in one part of an organ or body system or in more than one part of that organ or body system. Bone is the most common single place for LCH to be found.
- Multisystem LCH: LCH is found in two or more organs or body systems or may be found throughout the body. Multisystem LCH is less common than single-system LCH.

LCH may affect low-risk organs or high-risk organs:

- Low-risk organs include the skin, bone, lungs, lymph nodes, gastrointestinal tract, pituitary gland, thyroid gland, thymus, and central nervous system (CNS).
- High-risk organs include the liver, spleen, and bone marrow.

### Sometimes LCH continues to grow or comes back after treatment.

Progressive LCH describes LCH that continues to grow, spread, or get worse. Progressive disease may be a sign that the LCH has become refractory to treatment.

Refractory LCH describes LCH that does not respond to initial treatment.

Recurrent or reactivated LCH describes LCH that has come back after it has been treated.

Many patients with LCH get better with treatment. However, when treatment stops, new lesions may appear or old lesions may come back. This is called reactivation (recurrence) and may occur within 1 year after stopping treatment. Patients with multisystem disease are more likely to have a reactivation. Common sites of reactivation are bone, ears, or skin. Diabetes insipidus also may develop. Less common sites of reactivation include lymph nodes, bone marrow, spleen, liver, or lung. Some patients may have more than one reactivation.

## Treatment Option Overview for LCH

Key Points for This Section
- There are different types of treatment for patients with Langerhans cell histiocytosis (LCH).
- Children with LCH should have their treatment planned by a team of health care providers who are experts in treating childhood cancer or LCH.
- Nine types of standard treatment are used to treat LCH.
  - Chemotherapy
  - Surgery
  - Radiation therapy
  - Photodynamic therapy
  - Immunotherapy
  - Targeted therapy
  - Other drug therapy
  - Stem cell transplant
  - Observation
- New types of treatment are being tested in clinical trials.
- Treatment for Langerhans cell histiocytosis may cause side effects.
- Patients may want to think about taking part in a clinical trial.
- Patients can enter clinical trials before, during, or after starting their treatment.
- Follow-up tests may be needed.

### There are different types of treatment for patients with Langerhans cell histiocytosis (LCH).

Different types of treatments are available for patients with LCH. Some treatments are standard (the currently used treatment), and some are being tested in clinical trials. A treatment clinical trial is a research study meant to help improve current treatments or obtain information on new treatments for patients with cancer. When clinical trials show that a new treatment is better than the standard treatment, the new treatment may become the standard treatment. Whenever possible, patients should take part in a clinical trial in order to receive new types of treatment for LCH. Some clinical trials are open only to patients who have not started treatment.

Clinical trials are taking place in many parts of the country. Information about ongoing clinical trials is available from the NCI website (https://www.cancer.gov/research/participate/clinical-trials). Choosing the most appropriate treatment is a decision that ideally involves the patient, family, and health care team.

### Children with LCH should have their treatment planned by a team of health care providers who are experts in treating childhood cancer or LCH.

Treatment will be overseen by a pediatric oncologist, a doctor who specializes in treating children with cancer. The pediatric oncologist works with other pediatric health care providers who are experts in treating children with LCH and who specialize in certain areas of medicine. These may include the following specialists:

- Pediatrician.
- Pediatric surgeon.
- Pediatric hematologist.
- Radiation oncologist.
- Neurologist.
- Endocrinologist.
- Pediatric nurse specialist.
- Rehabilitation specialist.
- Psychologist.
- Social worker.

### Nine types of standard treatment are used to treat LCH.

Although it is unknown whether LCH is a type of cancer, some of the treatments used for cancer are effective at treating LCH.

#### Chemotherapy

Chemotherapy is a cancer treatment that uses drugs to stop the growth of cancer cells, either by killing the cells or by stopping them from dividing. Chemotherapy that is taken by mouth or injected into a vein or muscle enters the bloodstream and can reach cancer cells throughout the body (systemic chemotherapy). Chemotherapy may also be applied to the skin in a cream or lotion (topical chemotherapy).

Chemotherapy may be given by injection, by mouth, or applied to the skin to treat LCH.

#### Surgery

Surgery may be used to remove LCH lesions and a small amount of nearby healthy tissue. Curettage is a type of surgery that uses a curette (a sharp, spoon-shaped tool) to scrape LCH cells from bone.

When there is severe liver or lung damage, the entire organ may be removed and replaced with a healthy liver or lung from a donor.

#### Radiation therapy

Radiation therapy is a cancer treatment that uses high-energy x-rays or other types of radiation to kill cancer cells or keep them from growing. External radiation therapy uses a machine outside the body to send radiation toward the area of the body with cancer. Ultraviolet B (UVB) radiation therapy may be given using a special lamp that directs radiation toward LCH skin lesions.

#### Photodynamic therapy

Photodynamic therapy is a cancer treatment that uses a drug and a certain type of laser light to kill cancer cells. A drug that is not active until it is exposed to light is injected into a vein. The drug collects more in cancer cells than in normal cells. For LCH, laser light is aimed at the skin and the drug becomes active and kills the cancer cells. Photodynamic therapy causes little damage to healthy tissue. Patients who have photodynamic therapy should not spend too much time in the sun.

In one type of photodynamic therapy, called psoralen and ultraviolet A (PUVA) therapy, the patient receives a drug called psoralen and then ultraviolet A radiation is directed to the skin.

#### Immunotherapy

Immunotherapy is a treatment that uses the patient’s immune system to fight cancer. Substances made by the body or made in a laboratory are used to boost, direct, or restore the body’s natural defenses against cancer. Thalidomide is a type of immunotherapy used to treat LCH.

#### Targeted therapy

Targeted therapy is a type of treatment that uses drugs or other substances to identify and attack specific cancer cells. There are different types of targeted therapy:

- BRAF inhibitors block proteins needed for cell growth and may kill cancer cells. The BRAF gene is found in a mutated (changed) form in some LCH and blocking it may help keep LCH cells from growing.
  - Vemurafenib and dabrafenib are BRAF inhibitors used to treat LCH.
- MEK inhibitors block proteins called MEK1 and MEK2 that affect the growth and survival of cancer cells.
  - Trametinib is a MEK inhibitor that is being studied in the treatment of certain childhood tumors for use alone or combined with dabrafenib.
- Monoclonal antibodies are immune system proteins made in the laboratory to treat many diseases, including cancer. As a cancer treatment, these antibodies can attach to a specific target on cancer cells or other cells that may help cancer cells grow. The antibodies are able to then kill the cancer cells, block their growth, or keep them from spreading. Monoclonal antibodies are given by infusion. They may be used alone or to carry drugs, toxins, or radioactive material directly to cancer cells.
  - Rituximab is a monoclonal antibody used to treat LCH.
  monoclonal antibodies: how monoclonal antibodies treat cancer
  How do monoclonal antibodies work to treat cancer? This video shows how monoclonal antibodies, such as trastuzumab, pembrolizumab, and rituximab, block molecules cancer cells need to grow, flag cancer cells for destruction by the body’s immune system, or deliver harmful substances to cancer cells.
  YouTube (https://www.youtube.com/watch?v=dxnjAc-rqz8)

#### Other drug therapy

Other drugs used to treat LCH include the following:

- Steroid therapy, such as prednisone, is used to treat LCH lesions.
- Bisphosphonate therapy (such as pamidronate, zoledronate, or alendronate) is used to treat LCH lesions of the bone and to lessen bone pain.
- Anti-inflammatory drugs are drugs (such as pioglitazone and rofecoxib) that are commonly used to decrease fever, swelling, pain, and redness. Anti-inflammatory drugs and chemotherapy may be given together to treat adults with bone LCH.

#### Stem cell transplant

Chemotherapy is given to kill cancer cells. Healthy cells, including blood-forming cells, are destroyed by the LCH treatment. Stem cell transplant is a treatment to replace the blood-forming cells. Stem cells (immature blood cells) are removed from the blood or bone marrow of the patient or a donor and are frozen and stored. After the patient completes chemotherapy, the stored stem cells are thawed and given back to the patient through an infusion. These stem cells grow into (and restore) the body's blood cells.

#### Observation

Observation is closely monitoring a patient's condition without giving any treatment until signs or symptoms appear or change.

### New types of treatment are being tested in clinical trials.

Information about clinical trials is available from the NCI website (https://www.cancer.gov/research/participate/clinical-trials).

### Treatment for Langerhans cell histiocytosis may cause side effects.

To learn more about side effects that begin during treatment for cancer, visit Side Effects (https://www.cancer.gov/about-cancer/treatment/side-effects).

Side effects from cancer treatment that begin after treatment and continue for months or years are called late effects. Late effects of cancer treatment may include the following:

- Slow growth and development.
- Hormone imbalance.
- Hearing loss.
- Bone, tooth, liver, and lung problems.
- Changes in mood, feeling, behavior, learning, thinking, or memory.
- Second cancers, such as leukemia, lymphoma, retinoblastoma, Ewing sarcoma, brain or liver cancer.

Some late effects may be treated or controlled. It is important to talk with your child's doctors about the effects cancer treatment can have on your child. For more information, see Late Effects of Treatment for Childhood Cancer.

Many patients with multisystem LCH have late effects caused by treatment or by the disease itself. These patients often have long-term health problems that affect their quality of life.

### Patients may want to think about taking part in a clinical trial.

For some patients, taking part in a clinical trial may be the best treatment choice. Clinical trials are part of the cancer research process. Clinical trials are done to find out if new cancer treatments are safe and effective or better than the standard treatment.

Many of today's standard treatments for cancer are based on earlier clinical trials. Patients who take part in a clinical trial may receive the standard treatment or be among the first to receive a new treatment.

Patients who take part in clinical trials also help improve the way cancer will be treated in the future. Even when clinical trials do not lead to effective new treatments, they often answer important questions and help move research forward.

### Patients can enter clinical trials before, during, or after starting their treatment.

Some clinical trials only include patients who have not yet received treatment. Other trials test treatments for patients whose cancer has not gotten better. There are also clinical trials that test new ways to stop cancer from recurring (coming back) or reduce the side effects of cancer treatment.

Clinical trials are taking place in many parts of the country. Information about clinical trials supported by NCI can be found on NCI’s clinical trials search (https://www.cancer.gov/research/participate/clinical-trials-search) webpage. Clinical trials supported by other organizations can be found on the ClinicalTrials.gov website.

### Follow-up tests may be needed.

LCH patients should be monitored for many years because of the risk of reactivation (recurrence). Some of the tests that were done to diagnose LCH may be repeated. This is to see how well the treatment is working and if there are any new lesions. These tests may include:

- Physical exam.
- Neurological exam.
- Ultrasound exam.
- MRI.
- CT scan.
- PET scan.

Other tests that may be needed include:

- Brain stem auditory evoked response (BAER) test: A test that measures the brain's response to clicking sounds or certain tones to detect some types of hearing loss.
- Pulmonary function test (PFT): A test to see how well the lungs are working. It measures how much air the lungs can hold and how quickly air moves into and out of the lungs. It also measures how much oxygen is used and how much carbon dioxide is given off during breathing. This is also called a lung function test.
- Chest x-ray: An x-ray of the organs and bones inside the chest. An x-ray is a type of energy beam that can go through the body and onto film, making a picture of areas inside the body.

The results of these tests can show if your condition has changed or if the cancer has recurred (come back). These tests are sometimes called follow-up tests or check-ups. Decisions about whether to continue, change, or stop treatment may be based on the results of these tests.

## Treatment of Low-Risk LCH in Children

For information about the treatments listed below, see the Treatment Option Overview section.

### Skin Lesions

Treatment of newly diagnosed childhood Langerhans cell histiocytosis (LCH) skin lesions may include:

- Observation. Young children with skin-only LCH lesions should be followed over a period of many years due to a risk of diabetes insipidus.

When severe rashes, pain, ulceration, or bleeding occur, treatment may include the following:

- Steroid therapy.
- Chemotherapy given by mouth or vein.
- Chemotherapy applied to the skin.
- Photodynamic therapy with psoralen and ultraviolet A (PUVA) therapy.
- UVB radiation therapy.

### Lesions in Bones or Other Low-Risk Organs

Treatment of newly diagnosed childhood LCH bone lesions in the front, sides, or back of the skull, or in any other single bone may include:

- Surgery (curettage) with or without steroid therapy.
- Low-dose radiation therapy for lesions that affect nearby organs, or are painful and cannot be treated with other therapy.

Treatment of newly diagnosed childhood LCH lesions in bones around the ears or eyes is done to lower the risk of diabetes insipidus and other long-term problems. Treatment may include:

- Chemotherapy and steroid therapy.
- Surgery (curettage).

Treatment of newly diagnosed childhood LCH lesions of the spine or thigh bone may include:

- Observation.
- Low-dose radiation therapy.
- Chemotherapy, for lesions that spread from the spine into nearby tissue.
- Surgery to strengthen the weakened bone by bracing or fusing the bones together.

Treatment of two or more bone lesions may include:

- Chemotherapy and steroid therapy.

Treatment of two or more bone lesions combined with skin lesions, lymph node lesions, or diabetes insipidus may include:

- Chemotherapy with or without steroid therapy.
- Bisphosphonate therapy.

### CNS Lesions

Treatment of newly diagnosed childhood LCH central nervous system (CNS) lesions may include:

- Chemotherapy with or without steroid therapy.

Treatment of newly diagnosed LCH CNS neurodegenerative syndrome may include:

- Targeted therapy with BRAF inhibitors (vemurafenib or dabrafenib).
- Chemotherapy.
- Targeted therapy with a monoclonal antibody (rituximab).

Use our clinical trial search (https://www.cancer.gov/research/participate/clinical-trials-search) to find NCI-supported cancer clinical trials that are accepting patients. You can search for trials based on the type of cancer, the age of the patient, and where the trials are being done. General information (https://www.cancer.gov/research/participate/clinical-trials) about clinical trials is also available.

## Treatment of High-Risk LCH in Children

For information about the treatments listed below, see the Treatment Option Overview section.

Treatment of newly diagnosed childhood LCH multisystem disease lesions in the spleen, liver, or bone marrow and another organ or site may include:

- Chemotherapy and steroid therapy. Higher doses of more than one chemotherapy drug and steroid therapy may be given to patients whose tumors do not respond to initial chemotherapy.
- Targeted therapy (vemurafenib).
- A liver transplant for patients with severe liver damage.
- A clinical trial that tailors the patient's treatment based on features of the LCH at diagnosis and how it responds to treatment.
- A clinical trial of chemotherapy and steroid therapy.

## Treatment of Progressive, Refractory, or Recurrent Childhood LCH in Children

For information about the treatments listed below, see the Treatment Option Overview section.

Treatment of progressive, refractory, or recurrent low-risk LCH may include:

- Chemotherapy with or without steroid therapy.
- Bisphosphonate therapy.

Treatment of progressive, refractory, or recurrent high-risk multisystem LCH may include:

- Chemotherapy.
- Targeted therapy (vemurafenib).
- Stem cell transplant.

Treatments being studied for progressive, refractory, or recurrent childhood LCH include the following:

- A clinical trial that tailors the patient's treatment based on features of the LCH at diagnosis and how it responds to treatment.
- A clinical trial of targeted therapy (trametinib and dabrafenib).

## Treatment of LCH in Adults

Langerhans cell histiocytosis (LCH) in adults is a lot like LCH in children and can form in the same organs and systems as it does in children. These include the endocrine and central nervous systems, liver, spleen, bone marrow, and gastrointestinal tract. In adults, LCH is most commonly found in the lung as a single-system disease. In some patients, other organs may be involved, including bone, skin, hypothalamus, or pituitary gland. LCH in the lung occurs more often in young adults who smoke.

As in children, the signs and symptoms of LCH depend on where it is found in the body. See the General Information section for the signs and symptoms of LCH.

Tests that examine the organs and body systems where LCH may occur are used to detect (find) and diagnose LCH. See the General Information section for tests and procedures used to diagnose LCH.

In adults, there is not a lot of information about what treatment works best. Sometimes, information comes only from reports of the diagnosis, treatment, and follow-up of one adult or a small group of adults who were given the same type of treatment.

Adult patients with LCH have higher rates of other cancers than do adults of the same age without LCH. These cancers may be found before, at the same time, or after an LCH diagnosis, and occur more in patients who smoke.

For information about the treatments listed below, see the Treatment Option Overview section.

### Lung Lesions

Treatment for LCH of the lung in adults may include:

- Quitting smoking. Lung damage will get worse over time in patients who do not quit smoking. In patients who quit smoking, lung damage may get better or it may get worse over time.
- Chemotherapy.
- Lung transplant for patients with severe lung damage.
- Steroid therapy.

Sometimes LCH of the lung will go away or not get worse even if it's not treated.

### Bone Lesions

Treatment for LCH that affects only the bone in adults may include:

- Surgery with or without steroid therapy.
- Chemotherapy.
- Radiation therapy.
- Bisphosphonate therapy, for severe bone pain.
- Anti-inflammatory drugs (pioglitazone or rofecoxib) with chemotherapy.

### Skin Lesions

Treatment for LCH that affects only the skin in adults may include:

- Surgery.
- Steroid or other drug therapy (tacrolimus or imiquimod) applied or injected into the skin.
- Photodynamic therapy with psoralen and ultraviolet A (PUVA) radiation.
- UVB radiation therapy.
- Chemotherapy or immunotherapy given by mouth, such as methotrexate, thalidomide, or hydroxyurea.

Treatment for LCH that affects the skin and other body systems in adults may include:

- Chemotherapy.

### Single-System and Multisystem Disease

Treatment of single-system and multisystem disease in adults that does not affect the lung, bone, or skin may include:

- Chemotherapy.
- Radiation therapy.
- Targeted therapy (vemurafenib).

For more about LCH trials for adults, see the Histiocyte Society (http://www.histiocytesociety.org/) website.

Use our clinical trial search (https://www.cancer.gov/research/participate/clinical-trials-search) to find NCI-supported cancer clinical trials that are accepting patients. You can search for trials based on the type of cancer, the age of the patient, and where the trials are being done. General information (https://www.cancer.gov/research/participate/clinical-trials) about clinical trials is also available.

## To Learn More About Langerhans Cell Histiocytosis

For more from the National Cancer Institute about Langerhans cell histiocytosis treatment, see the following:

- Computed Tomography (CT) Scans and Cancer (https://www.cancer.gov/about-cancer/diagnosis-staging/ct-scans-fact-sheet)
- Photodynamic Therapy for Cancer (https://www.cancer.gov/about-cancer/treatment/types/photodynamic-therapy)
- Immunotherapy to Treat Cancer (https://www.cancer.gov/about-cancer/treatment/types/immunotherapy)
- Targeted Therapy to Treat Cancer (https://www.cancer.gov/about-cancer/treatment/types/targeted-therapies)
- Stem Cell Transplants in Cancer Treatment (https://www.cancer.gov/about-cancer/treatment/types/stem-cell-transplant)

For more childhood cancer information and other general cancer resources, visit:

- About Cancer (https://www.cancer.gov/about-cancer)
- Childhood Cancers (https://www.cancer.gov/types/childhood-cancers)
- CureSearch for Children's Cancer (http://www.curesearch.org/)
- Late Effects of Treatment for Childhood Cancer
- Adolescents and Young Adults with Cancer (https://www.cancer.gov/types/aya)
- Children with Cancer: A Guide for Parents (https://www.cancer.gov/publications/patient-education/guide-for-parents)
- Cancer in Children and Adolescents (https://www.cancer.gov/types/childhood-cancers/child-adolescent-cancers-fact-sheet)
- Cancer Staging (https://www.cancer.gov/about-cancer/diagnosis-staging/staging)
- Coping with Cancer (https://www.cancer.gov/about-cancer/coping)
- Questions to Ask Your Doctor about Cancer (https://www.cancer.gov/about-cancer/coping/questions)
- For Survivors, Caregivers, and Advocates (https://cancercontrol.cancer.gov/ocs/resources/survivors.html)

## About This PDQ Summary

### About PDQ

Physician Data Query (PDQ) is the National Cancer Institute's (NCI's) comprehensive cancer information database. The PDQ database contains summaries of the latest published information on cancer prevention, detection, genetics, treatment, supportive care, and complementary and alternative medicine. Most summaries come in two versions. The health professional versions have detailed information written in technical language. The patient versions are written in easy-to-understand, nontechnical language. Both versions have cancer information that is accurate and up to date and most versions are also available in Spanish (https://www.cancer.gov/espanol/publicaciones/pdq).

PDQ is a service of the NCI. The NCI is part of the National Institutes of Health (NIH). NIH is the federal government’s center of biomedical research. The PDQ summaries are based on an independent review of the medical literature. They are not policy statements of the NCI or the NIH.

### Purpose of This Summary

This PDQ cancer information summary has current information about the treatment of childhood and adult Langerhans cell histiocytosis. It is meant to inform and help patients, families, and caregivers. It does not give formal guidelines or recommendations for making decisions about health care.

### Reviewers and Updates

Editorial Boards write the PDQ cancer information summaries and keep them up to date. These Boards are made up of experts in cancer treatment and other specialties related to cancer. The summaries are reviewed regularly and changes are made when there is new information. The date on each summary ("Updated") is the date of the most recent change.

The information in this patient summary was taken from the health professional version, which is reviewed regularly and updated as needed, by the PDQ Pediatric Treatment Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/pediatric-treatment).

### Clinical Trial Information

A clinical trial is a study to answer a scientific question, such as whether one treatment is better than another. Trials are based on past studies and what has been learned in the laboratory. Each trial answers certain scientific questions in order to find new and better ways to help cancer patients. During treatment clinical trials, information is collected about the effects of a new treatment and how well it works. If a clinical trial shows that a new treatment is better than one currently being used, the new treatment may become "standard." Patients may want to think about taking part in a clinical trial. Some clinical trials are open only to patients who have not started treatment.

Clinical trials can be found online at NCI's website (https://www.cancer.gov/research/participate/clinical-trials). For more information, call the Cancer Information Service (https://www.cancer.gov/contact/contact-center) (CIS), NCI's contact center, at 1-800-4-CANCER (1-800-422-6237).

### Permission to Use This Summary

PDQ is a registered trademark. The content of PDQ documents can be used freely as text. It cannot be identified as an NCI PDQ cancer information summary unless the whole summary is shown and it is updated regularly. However, a user would be allowed to write a sentence such as “NCI’s PDQ cancer information summary about breast cancer prevention states the risks in the following way: [include excerpt from the summary].”

The best way to cite this PDQ summary is:

PDQ® Pediatric Treatment Editorial Board. PDQ Langerhans Cell Histiocytosis Treatment. Bethesda, MD: National Cancer Institute. Updated <MM/DD/YYYY>. Available at: https://www.cancer.gov/types/langerhans/patient/langerhans-treatment-pdq. Accessed <MM/DD/YYYY>. [PMID: 26389196]

Images in this summary are used with permission of the author(s), artist, and/or publisher for use in the PDQ summaries only. If you want to use an image from a PDQ summary and you are not using the whole summary, you must get permission from the owner. It cannot be given by the National Cancer Institute. Information about using the images in this summary, along with many other images related to cancer can be found in Visuals Online (https://visualsonline.cancer.gov/). Visuals Online is a collection of more than 3,000 scientific images.

### Disclaimer

The information in these summaries should not be used to make decisions about insurance reimbursement. More information on insurance coverage is available on Cancer.gov on the Managing Cancer Care (https://www.cancer.gov/about-cancer/managing-care) page.

### Contact Us

More information about contacting us or receiving help with the Cancer.gov website can be found on our Contact Us for Help (https://www.cancer.gov/contact) page. Questions can also be submitted to Cancer.gov through the website’s E-mail Us (https://www.cancer.gov/contact/email-us).